# Black Cohosh (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of black cohosh in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This cancer information summary provides an overview of the use of black cohosh as a treatment in breast cancer patients and survivors, generally for the relief of symptoms or side effects. The summary provides a brief history of black cohosh research, the results of laboratory and clinical trials, and possible side effects of black cohosh use.

This summary contains the following key information:

- The roots and rhizomes of black cohosh are used for various medicinal purposes ranging from gynecologic to other disorders.
- Black cohosh was first used by American Indian or Alaska Native people. it is now commonly used in Europe.
- Black cohosh is frequently studied as a complementary therapy for breast cancer patients and survivors to reduce vasomotor symptoms associated with treatment-induced menopause.
- Purported estrogenic actions of black cohosh are refuted by current, up-to-date laboratory and clinical studies of commercially available hydroalcoholic extracts. Suggestions of serotonergic activity are well supported.
- Recent findings show that black cohosh contains a large variety of constituents that are chemically related to central nervous system–active molecules, which have not been studied in detail yet.
- Commercially available hydroalcoholic extracts of black cohosh have been well tolerated, with very rare serious adverse effects reported.
- Observational and open-label studies indicate benefits of black cohosh on climacteric symptoms in cancer and noncancer populations, though gold-standard clinical investigations fail to confirm this effect.
- Given both the evidence and variability of previous findings, including the lack of demonstration of a clinical benefit against placebo and underexplored constituents, further preclinical and clinical studies of black cohosh are warranted.

## General Information

Native to eastern and midwestern North America, black cohosh (Actaea racemosa, also known as Cimicifuga racemosa) [1] is a member of the buttercup family (Ranunculaceae).[2,3] Black cohosh has many synonyms, including black snakeroot, bugbane, rattleroot, squawroot, and macrotrys or macrotys.[2-4] The roots and rhizomes of the black cohosh plant are used for medicinal preparations.

Various types of extracts of black cohosh roots and rhizomes have been studied for their chemical composition and biological activity. Lipophilic extracts have predominantly been used in laboratory studies and only infrequently in clinical trials.[3] The most commonly used clinical preparations of black cohosh (e.g., Remifemin® and BNO 1055) are made from hydrophilic (typically hydroalcoholic) extracts.[4] Lipophilic extracts have in vitro effects on estrogen-regulated genes, whereas hydrophilic extracts generally do not.[3]

Several of the chemical constituents of black cohosh extracts have biological activities that have been demonstrated through in vitro studies and are candidate markers for the observed in vivo and clinical effects. Triterpene glycosides have structures similar to steroids,[4] but no apparent direct binding to the estrogen receptor.[3] One of the most abundant of such glycosides, 23-epi-26-deoxyactein, is specific for black cohosh and is the constituent usually chosen for standardization of commercial products.[2,3] At least 40 different triterpene glycoside analogues have been identified in black cohosh (A. racemosa), including actein and cimicifugoside congeners.[2,3]

Other chemical constituents of black cohosh extracts include aromatic acid phenolpropanoids related to caffeic and ferulic acid, along with the black cohosh-specific fukinolic acid.[5] The plant also contains a large variety of guanidine alkaloids, which have been explored chemically but not studied biologically.

Various plants that resemble black cohosh have been mistakenly or intentionally included in some commercial black cohosh products or plants. Such adulteration can be detected by methods such as microscopy, high-performance thin-layer chromatography, high-performance liquid chromatography ultraviolet, and DNA barcoding.[2]

Black cohosh root, rhizome, and associated preparations have gained considerable international market and consumer interest for more than 60 years, particularly gaining U.S. interest within the last 15 years.[6] A market report released by the American Botanical Council stated that black cohosh extract was among the 15 top-selling herbal dietary supplements by the food, drug, and mass-market channel in the United States in 2019, with total sales nearing $30 million.[7] Growth in market demand for black cohosh has led to an increased need for scientific evidence of quality, safety, and efficacy.[4,5,8]

Companies distribute black cohosh as a dietary supplement. In the United States, dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. The quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition, and limits on contamination that may adulterate dietary supplements. The FDA can remove dietary supplements from the market that are deemed unsafe. Because dietary supplements are not formally reviewed for manufacturing consistency every year, ingredients may vary considerably from lot to lot and there is no guarantee that ingredients claimed on product labels are present (or are present in the specified amounts). The FDA has not approved the use of black cohosh as a treatment for cancer or any other medical condition.

### References

European Union Herbal Monograph on Cimicifuga racemosa (L.) Nutt., rhizoma. London, United Kingdom: Committee on Herbal Medicinal Products, 2018. Available online (https://www.ema.europa.eu/en/documents/herbal-monograph/final-european-union-herbal-monograph-cimicifuga-racemosa-l-nutt-rhizome-revision-1_en.pdf). Last accessed September 18, 2024.
Predny ML, De Angelis P, Chamberlain JL: Black cohosh (Actaea racemosa): an annotated bibliography. U.S. Department of Agriculture Forest Service, Southern Research Station, 2006. General Technical Report SRS 97.
Fabricant DS, Krause EC, Farnsworth NR: Black cohosh. In: Coates PM, Blackman MR, Cragg GM: Encyclopedia of Dietary Supplements. 2^nd^ ed. CRC Press, 2015, pp 60-74.
Qiu F, McAlpine JB, Krause EC, et al.: Pharmacognosy of black cohosh: the phytochemical and biological profile of a major botanical dietary supplement. Prog Chem Org Nat Prod 99: 1-68, 2014.25296437
Gafner S: Black Cohosh Laboratory Guidance Document. ABC-AHP-NCNPR Botanical Adulterants Program, 2015.
Foster S: Exploring the peripatetic maze of black cohosh adulteration: a review of the nomenclature, distribution, chemistry, market status, analytical methods, and safety. HerbalGram (98): 32-51, 2013. Available online (https://www.herbalgram.org/resources/herbalgram/issues/98/table-of-contents/hg98feat-blackcohosh/). Last accessed September 18, 2024.
Smith T, May G, Eckl V, et al.: US sales of herbal supplements increase by 8.6% in 2019. HerbalGram (127): 54-69, 2020. Available online (https://www.herbalgram.org/resources/herbalgram/issues/127/table-of-contents/herbalgram-127-herb-market-report/). Last accessed September 18, 2024.
Gafner S: Botanical adulterants bulletin on adulteration of actaea racemosa. Black Cohosh - Botanical Adulterants Bulletin 1-5, 2016.

## History

Black cohosh was in use by American Indian or Alaska Native people when Europeans arrived in the New World.[1] Among the reported indications for black cohosh in traditional American Indian or Alaska Native medicine were various female conditions, rheumatism, fever (possibly due to malaria), general malaise, sore throat, childbirth, and snakebite.[1,2] Early European settlers, and subsequently American eclectic physicians, assimilated the use of black cohosh and began exporting the herb to Europe as early as the 18th century.[1]

Europeans have used black cohosh to treat menopausal symptoms for over 50 years. In Germany, the Commission E approved black cohosh as a treatment for dysmenorrhea, menopausal symptoms, heart palpitations, nervousness, irritability, sleep disturbances, tinnitus, vertigo, perspiration, and depression.[1]

Various sources suggested that the recommended dose of crude drug is 40 mg per day.[1,3] At least one trial compared two different doses (39 mg and 127.3 mg) [4] in women with menopausal symptoms and found equivalent beneficial effects at both doses. The lack of long-term safety studies has led some groups to recommend limiting the use of black cohosh to a maximum of 6 months.[1,5]

### References

Predny ML, De Angelis P, Chamberlain JL: Black cohosh (Actaea racemosa): an annotated bibliography. U.S. Department of Agriculture Forest Service, Southern Research Station, 2006. General Technical Report SRS 97.
Qiu F, McAlpine JB, Krause EC, et al.: Pharmacognosy of black cohosh: the phytochemical and biological profile of a major botanical dietary supplement. Prog Chem Org Nat Prod 99: 1-68, 2014.25296437
Fabricant DS, Krause EC, Farnsworth NR: Black cohosh. In: Coates PM, Blackman MR, Cragg GM: Encyclopedia of Dietary Supplements. 2^nd^ ed. CRC Press, 2015, pp 60-74.
Liske E, Hänggi W, Henneicke-von Zepelin HH, et al.: Physiological investigation of a unique extract of black cohosh (Cimicifugae racemosae rhizoma): a 6-month clinical study demonstrates no systemic estrogenic effect. J Womens Health Gend Based Med 11 (2): 163-74, 2002.11975864
Cimicifugae Rhizoma. Amsterdam, The Netherlands: European Medicines Agency, 2018. Available online (https://www.ema.europa.eu/en/medicines/herbal/cimicifugae-rhizoma). Last accessed September 18, 2024.

## Laboratory/Animal/Preclinical Studies

### Mechanism of Action

Given the apparent clinical effects of black cohosh on menopausal symptoms, early preclinical investigations searched for an anticipated estrogenic activity. These research studies demonstrated differences between lipophilic extracts, which often had evidence of estrogenic activity,[1] and the hydroalcoholic extracts of the type contained in the most commonly used clinical products, which generally lacked such activity.[1,2]

Considering the recent discovery of nitrogenous black cohosh constituents,[2] subsequent hypotheses for the activity of black cohosh involve potential effects on hypothalamic neurotransmitter regulation systems,[1,3] such as those involving the endogenous central opioid system.[4] This hypothesis is supported by the observation that while black cohosh treatment alone has no effect on luteinizing hormone (LH) activity, induction of naloxone blockade of µ-opioid receptors in postmenopausal women treated with Remifemin® leads to the suppression of LH activity.[4] Positron emission tomography imaging in women treated with black cohosh indicated selective µ-opioid receptor availability, with increased availability in regions responsible for emotional and cognitive processing, and pronounced reductions observed in areas associated with the human placebo response.[4] Given such results, and the comparatively high frequency of placebo responsiveness in black cohosh clinical trials, both pharmacologic and placebo effects simultaneously affecting the endogenous opioid system are suggested.

### References

Fabricant DS, Krause EC, Farnsworth NR: Black cohosh. In: Coates PM, Blackman MR, Cragg GM: Encyclopedia of Dietary Supplements. 2^nd^ ed. CRC Press, 2015, pp 60-74.
Qiu F, McAlpine JB, Krause EC, et al.: Pharmacognosy of black cohosh: the phytochemical and biological profile of a major botanical dietary supplement. Prog Chem Org Nat Prod 99: 1-68, 2014.25296437
Fritz H, Seely D, McGowan J, et al.: Black cohosh and breast cancer: a systematic review. Integr Cancer Ther 13 (1): 12-29, 2014.23439657
Reame NE, Lukacs JL, Padmanabhan V, et al.: Black cohosh has central opioid activity in postmenopausal women: evidence from naloxone blockade and positron emission tomography neuroimaging. Menopause 15 (5): 832-40, 2008 Sep-Oct.18521048

## Human/Clinical Studies

### Mechanism of Action, Pharmacokinetics, Pharmacodynamics

Given that the clinically utilized hydrophilic extracts of black cohosh roots and rhizomes are not estrogenic, alternative mechanisms of menopausal symptom relief have been proposed, one of which suggests serotonergic activity by triterpenes to minimize episodes of hot flashes and bone loss.[1-4] While this finding warrants further investigation, it is currently common practice to standardize the content of commercially available black cohosh supplements to certain triterpene compounds related to actein, such as 23-epi-26-deoxyactein. Likewise, pharmacokinetic (PK) investigations of black cohosh triterpenes are more commonly reported.

The maximum-tolerated dose and PK of 23-epi-26-deoxyactein, the most abundant triterpene found in the plant,[5] has been evaluated in a phase I clinical trial. Single doses of an ethanolic black cohosh extract containing 1.4 mg, 2.8 mg, or 5.6 mg of 23-epi-26-deoxyactein (32 mg, 64 mg, or 128 mg of black cohosh, respectively) were administered to 15 healthy menopausal women.[1] Analysis of the compound in sera indicates a half-life of about 2 hours for all administered dosages (2.1 ± 0.4, 2.7 ± 0.4, and 3.0 ± 1.0 h, respectively). First-order kinetics is also indicated, with maximum concentration and area under the curve increasing proportionately with dosage. It is suggested that 23-epi-26-deoxyactein is excreted intact in bile and degraded in the gastrointestinal tract, as no metabolites of the compound were detected in urine or sera, and only a negligible amount (<0.01%) of the compound was recovered in urine 24 hours after oral administration; specific proof of predominant biliary secretion is needed.[1] In the same study, no alteration in circulating hormone levels (estradiol, follicle-stimulating hormone, luteinizing hormone) was observed in this population relative to baseline (P < .05). Changes have not been observed in similar investigations of systemic hormone levels or those monitoring for estrogenic effects on breast, endometrial, or vaginal tissues.[2]

Although case reports suggested connections between the use of dietary supplements containing black cohosh and liver damage, no evidence of hepatotoxicity—or any other form of serious toxicity—was found in systematic reviews of results from clinical trials of a chemically standardized black cohosh preparation; regardless of dosage administered, no liver function markers were altered.[1]

Reports of hepatic adverse effects include one case of acute liver failure, two cases of hepatitis (without further description), and two cases indicating mild elevation of liver function markers, though many of these patients were taking multiple botanical products simultaneously.[6] An episode of autoimmune hepatitis is questionably related to the use of black cohosh. Although noteworthy, many of these reports are anecdotal in nature.[6] Furthermore, a meta-analysis of randomized, double-blind, controlled clinical trials does not demonstrate evidence of black cohosh causing adverse effects on liver function.[7] Indications of toxicity are reportedly caused by manufacturer contamination or adulteration with other toxic products,[1] necessitating mechanisms of botanical authentication and proper methods of manufacturing the product. The not-infrequent adulteration of black cohosh with Asian Actaea species that contain significantly different phytoconstituents is the most plausible cause of the reported potential adverse hepatic effects.[8,9]

Acute toxicity of black cohosh is also purported to occur through interactions with pharmaceutical agents.[1,10] Though substantial herb-drug interactions can occur in this manner with certain herbs such as St. John’s wort, in vivo analysis of black cohosh metabolism does not suggest this interaction. Black cohosh supplementation does not significantly alter the expression or activity of metabolic enzymes CYP3A4, CYP1A2, or CYP2E1.[10] While a statistically significant decrease in the CYP2D6 phenotype (approximately 7%; P = .02) has been observed in a human study, the clinical relevancy of this finding is questionable [10]—especially since a very high dose was used for this particular investigation (1,090 mg bid). Studies have yet to verify this effect;[2] however, given that tamoxifen is a selective estrogen receptor modulator and is primarily metabolized by CYP2D6, even mild inhibition of the enzyme by black cohosh may warrant consideration.[2]

### Prevention of Breast Cancer/Recurrence

Observational studies of postmenopausal women without a history of breast cancer indicated no significant association between the use of black cohosh and development of the disease when compared with nonuse (hazard ratio = 1.17; 95% confidence interval [CI], 0.75–1.82; adjusted odds ratio [OR], 0.80; 95% CI, 0.63–1.00).[2]

One study suggested a possible protective effect. This case-control trial evaluated whether the use of hormone-related supplements, including black cohosh for the management of menopausal symptoms, was associated with cancer risk or protection.[11] A 53% decreased risk in the incidence of breast cancer was observed among postmenopausal women taking black cohosh compared with nonusers (adjusted OR, 0.47; 95% CI, 0.27–0.82). In subset analyses, ever-use of tamoxifen or raloxifene prior to cancer diagnosis (as a chemopreventive agent rather than a treatment for cancer) was not a significant confounder in the protective relationship observed between black cohosh use and breast cancer occurrence.[11]

Recurrence-free survival was also evaluated as a primary endpoint measure in a sample of breast cancer patients and survivors (n = 18,861), 1,102 of whom had received a product containing a black cohosh extract (i.e., Remifemin® or Remifemin® plus; R/R+, a 40% isopropanol black cohosh extract, with or without St. John’s wort extract,[12] respectively).[13] This retrospective cohort study reported a significantly lower risk of recurrence in R/R+ users compared with nonusers over a mean observation time of 3.6 years.[13] This decrease was observed in patients who also received tamoxifen. These results suggest that R/R+ is not likely to promote breast cancer recurrence or inhibit the therapeutic effect of tamoxifen.[13] No other studies have reported to further explore a potential beneficial effect of black cohosh extracts on breast cancer recurrence.

### Effect on Menopausal Symptoms

Several studies have investigated black cohosh in treating women suffering from climacteric complaints, including breast cancer patients and survivors.[2,3] Analyses of the effect of black cohosh preparations on these symptoms in patients with other cancers have not yet been reported.

### Breast Cancer Patients

Observational and open-label studies have demonstrated reductions in the number and severity of hot flashes among breast cancer patients undergoing adjuvant endocrine therapy complemented with black cohosh; however, randomized, double-blind, placebo-controlled clinical trials have failed to demonstrate reductions greater than that seen with placebo.[2]

Significant declines in hot flash frequency and severity and other menopausal symptoms are reported in a review of observational studies of breast cancer patients and survivors taking Remifemin® (20–40 mg/d), with or without tamoxifen or raloxifene.[2] Prospective trials indicated reductions as high as 56% (95% CI = 40%–71%) in hot flash scores (daily frequency times average severity).[2] Self-assessment of menopausal symptoms through the Menopausal Rating Scale (MRS II) has also been evaluated among breast cancer patients on Remifemin® (40 mg/d) plus tamoxifen (10–40 mg/d), indicating significant declines in menopausal symptomology (P < .001) from baseline, and after 1, 3, and 6 months of black cohosh treatment.[2]

Statistically significant reductions in hot flash symptomology have also been observed in open-label administration of another black cohosh product, CR BNO 1055 from Bionorica in Germany (40 mg/d), in breast cancer survivors who received adjuvant therapy with tamoxifen; however, double-blind studies so far have failed to show this to be a specific effect.[2]

Thus far, two randomized, placebo-controlled, double-blind clinical trials have assessed the efficacy of black cohosh use (one trial used black cohosh extract;[14] the other trial used an uncharacterized black cohosh product [15]) on hot flashes—or related vasomotor symptoms—in breast cancer survivors who received a selective estrogen receptor modulator (SERM). Neither study indicated a significant difference in menopausal symptomology between women taking the supplement (20–40 mg/d), or an identical-appearing placebo, with or without the use of tamoxifen (10–40 mg) or raloxifene (dosage not provided).[2,14]

One randomized clinical study specifically evaluated the preventative effect of Remifemin® on symptoms of menopause syndrome (MPS) in breast cancer patients who received luteinizing hormone-releasing hormone analogs (LHRH-a).[3] Some patients received LHRH-a treatment in addition to an aromatase inhibitor or SERM, though no significant difference in use was found between the treatment group and the control group.[3] Evaluation of MPS was assessed using Kupperman Menopausal Index (KMI) scores. Symptomology increased in both groups throughout the course of study; however, KMI scores of patients on LHRH-a treatment (goserelin, n = 32; leuprorelin, n = 10) with Remifemin® (40 mg/d) were significantly lower than those on adjuvant therapy alone (goserelin, n = 28; leuprorelin, n = 15) at each time point in this 12-week clinical trial (P < .01).

Given these conflicting results in observational and randomized clinical trials, a large placebo effect is presumably at play, especially considering the subjective nature of many of the endpoint measures.[2] Furthermore, the beneficial effect observed through an open-label study left unconfirmed through double-blind studies further obscured the understanding of the true effect of black cohosh in alleviating climacteric symptoms in this patient population; however, given the unlikely negative impact on breast cancer risk or recurrence,[11,13] along with evidence of relative safety, more research is warranted.[1,2,7,10]

### Noncancer Patients

The efficacy of black cohosh supplementation on vasomotor symptoms has also been evaluated in noncancer populations; however, these findings to date remain inconsistent.

At least two meta-analyses have addressed questions about the specific effect of black cohosh supplements versus placebo. The first meta-analysis [16] compared the effect of oral black cohosh monopreparations with that of the control group. Participants in the control group were given red clover, fluoxetine, or placebo. In three studies with placebo-control groups, there was no significant difference in hot flash frequency between the black cohosh group and the placebo group. The second meta-analysis included six different randomized controlled trials that investigated the efficacy of a single formulation of black cohosh (isopropanolic black cohosh extract [iCR]) in reducing climacteric symptomology (neurovegetative and psychological menopausal symptoms) in perimenopausal and postmenopausal women.[17] Patients who received iCR displayed significant reductions in climacteric symptoms when compared with patients who received the placebo. One study used a black cohosh/St. John’s wort combination therapy, and the other five studies used iCR alone. This meta-analysis also found that women treated with higher doses of black cohosh monotherapy demonstrated the greatest improvement in climacteric symptomology.[17]

A comprehensive review of clinical trials that studied the use of black cohosh in noncancer menopausal and/or aging women was published in 2014. The review demonstrated that the overall heterogeneity of clinical evidence was due to major variation in exact intervention materials and clinical endpoints.[12,18] Variability in study results are possibly because of differences in extract preparation methods, potentially affecting the concentration of alkaloid constituents, which have not been previously studied in in vitro and clinical research. Other factors that contributed to the heterogeneity included doses administered and study group characteristics.

Similarly, the Herbal Alternatives for Menopause (HALT) study investigated the effect of black cohosh (CimiPure®, 70% ethanol extract standardized to 2.5% triterpene glycosides, 160 mg/d) and an encapsulated multibotanical-containing black cohosh (ProGyne; black cohosh, 200 mg/d, along with nine other ingredients),[19] both of which failed to show a benefit greater than that of placebo.[20]

Randomized controlled investigations of black cohosh used as monopreparations [16] or within multibotanical preparations [20] have yet proven effective in reducing climacteric complaints among women without a history of breast cancer.

### Management of Other Conditions

#### Bone mineral density

The therapeutic effects of black cohosh on bone metabolism have also been investigated as a secondary outcome measure in a randomized, double-blind clinical trial, comparing results to that of conjugated estrogens (CE) and placebo.[21] Daily administration of the black cohosh extract containing commercial product CR BNO 1055 (40 mg/d) demonstrated an effect equipotent to that of CE (0.6 mg) after 3 months of treatment. Analyses of bone turnover markers indicated a significant improvement above placebo values on bone metabolism in both the black cohosh and CE groups (P = .0138, both groups).[21] Unlike other groups, women treated with CR BNO 1055 displayed a significant increase in serum bone-specific alkaline phosphatase levels (P = .0358), indicating increases in bone formation. The effect demonstrated with CE supplementation was comparable, though distinct; compared with placebo, women displayed a significant decrease in bone degradation, as measured by serum levels of the C-terminal breakdown product of bone-specific type-1 collagen (P = .0181). Likewise, while the mechanism of action may be different than that of CE, black cohosh does appear to have an osteoprotective effect in postmenopausal women.[21] Potential benefits on bone metabolism are further supported in an uncontrolled trial by increases in osteocalcin levels in women receiving the supplement.[22]

Table 1. Clinical Studies of Black Cohosh in Patients With Cancer^a^

Reference | Trial Design | Condition Treated | No. of Patients: Enrolled; Treated; Placebo or No Treatment Control^b^ | Primary Outcome | Concurrent Therapy Used | Level of Evidence Score^c^
[14] | Randomized, double-blind, placebo-controlled, crossover trial | Hot flashes | 131; 66; 65 (crossover in treated and placebo groups) | No difference in hot flashes from black cohosh compared with placebo after 8 weeks of treatment (primary outcome) | Various hormonal therapies | 1iC
[15] | Randomized, double-blind, placebo-controlled trial | Hot flashes | 85; 42; 43 | No difference in the number of hot flashes from placebo at 57 to 60 days | Tamoxifen | 1iC
[3] | Randomized controlled trial | Menopausal symptoms | 85; 42; 43 | Menopausal symptoms (measured by KMI) significantly lower in patients treated with black cohosh | LHRH-a | 1iiC
[4] | Randomized, double-blind, placebo-controlled trial | Bone metabolism | 62; 20 (black cohosh), 22 (conjugated estrogens); 20 (placebo) | Statistically significant increase in bone-specific alkaline phosphatase level | Unknown | 1iC
[11] | Retrospective case-control | Breast cancer prevention | 101; 25; 76 | Statistically significant OR (0.47) for developing breast cancer in women who took black cohosh supplements | Various therapies | 2Di
[13] | Observational retrospective cohort | Breast cancer recurrence | 18,861; 1,102; 17,759 | Did not promote breast cancer recurrence or inhibit the therapeutic effect of tamoxifen | Tamoxifen | 2Di

KMI = Kupperman Menopausal Index; LHRH-a = luteinizing hormone-releasing hormone analogs; OR = odds ratio.

^a^For additional information and definition of terms, see text and the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### References

van Breemen RB, Liang W, Banuvar S, et al.: Pharmacokinetics of 23-epi-26-deoxyactein in women after oral administration of a standardized extract of black cohosh. Clin Pharmacol Ther 87 (2): 219-25, 2010.20032972
Fritz H, Seely D, McGowan J, et al.: Black cohosh and breast cancer: a systematic review. Integr Cancer Ther 13 (1): 12-29, 2014.23439657
Wang C, Huang Q, Liang CL, et al.: Effect of cimicifuga racemosa on menopausal syndrome caused by LHRH-a in breast cancer. J Ethnopharmacol 238: 111840, 2019.30935866
Wuttke W, Gorkow C, Seidlová-Wuttke D: Effects of black cohosh (Cimicifuga racemosa) on bone turnover, vaginal mucosa, and various blood parameters in postmenopausal women: a double-blind, placebo-controlled, and conjugated estrogens-controlled study. Menopause 13 (2): 185-96, 2006 Mar-Apr.16645532
Gafner S: Black Cohosh Laboratory Guidance Document. ABC-AHP-NCNPR Botanical Adulterants Program, 2015.
Cohen SM, O'Connor AM, Hart J, et al.: Autoimmune hepatitis associated with the use of black cohosh: a case study. Menopause 11 (5): 575-7, 2004 Sep-Oct.15356412
Naser B, Schnitker J, Minkin MJ, et al.: Suspected black cohosh hepatotoxicity: no evidence by meta-analysis of randomized controlled clinical trials for isopropanolic black cohosh extract. Menopause 18 (4): 366-75, 2011.21228727
Foster S: Exploring the peripatetic maze of black cohosh adulteration: a review of the nomenclature, distribution, chemistry, market status, analytical methods, and safety. HerbalGram (98): 32-51, 2013. Available online (https://www.herbalgram.org/resources/herbalgram/issues/98/table-of-contents/hg98feat-blackcohosh/). Last accessed September 18, 2024.
Gafner S: Botanical adulterants bulletin on adulteration of actaea racemosa. Black Cohosh - Botanical Adulterants Bulletin 1-5, 2016.
Gurley B, Hubbard MA, Williams DK, et al.: Assessing the clinical significance of botanical supplementation on human cytochrome P450 3A activity: comparison of a milk thistle and black cohosh product to rifampin and clarithromycin. J Clin Pharmacol 46 (2): 201-13, 2006.16432272
Rebbeck TR, Troxel AB, Norman S, et al.: A retrospective case-control study of the use of hormone-related supplements and association with breast cancer. Int J Cancer 120 (7): 1523-8, 2007.17205521
Qiu F, McAlpine JB, Krause EC, et al.: Pharmacognosy of black cohosh: the phytochemical and biological profile of a major botanical dietary supplement. Prog Chem Org Nat Prod 99: 1-68, 2014.25296437
Henneicke-von Zepelin HH, Meden H, Kostev K, et al.: Isopropanolic black cohosh extract and recurrence-free survival after breast cancer. Int J Clin Pharmacol Ther 45 (3): 143-54, 2007.17416109
Pockaj BA, Gallagher JG, Loprinzi CL, et al.: Phase III double-blind, randomized, placebo-controlled crossover trial of black cohosh in the management of hot flashes: NCCTG Trial N01CC1. J Clin Oncol 24 (18): 2836-41, 2006.16782922
Jacobson JS, Troxel AB, Evans J, et al.: Randomized trial of black cohosh for the treatment of hot flashes among women with a history of breast cancer. J Clin Oncol 19 (10): 2739-45, 2001.11352967
Leach MJ, Moore V: Black cohosh (Cimicifuga spp.) for menopausal symptoms. Cochrane Database Syst Rev (9): CD007244, 2012.22972105
Castelo-Branco C, Gambacciani M, Cano A, et al.: Review & meta-analysis: isopropanolic black cohosh extract iCR for menopausal symptoms - an update on the evidence. Climacteric 24 (2): 109-119, 2021.33021111
Geller SE, Shulman LP, van Breemen RB, et al.: Safety and efficacy of black cohosh and red clover for the management of vasomotor symptoms: a randomized controlled trial. Menopause 16 (6): 1156-66, 2009 Nov-Dec.19609225
Newton KM, Reed SD, Grothaus L, et al.: The Herbal Alternatives for Menopause (HALT) Study: background and study design. Maturitas 52 (2): 134-46, 2005.16186076
Reed SD, Newton KM, LaCroix AZ, et al.: Vaginal, endometrial, and reproductive hormone findings: randomized, placebo-controlled trial of black cohosh, multibotanical herbs, and dietary soy for vasomotor symptoms: the Herbal Alternatives for Menopause (HALT) Study. Menopause 15 (1): 51-8, 2008 Jan-Feb.18257142
Wuttke W, Seidlová-Wuttke D, Gorkow C: The Cimicifuga preparation BNO 1055 vs. conjugated estrogens in a double-blind placebo-controlled study: effects on menopause symptoms and bone markers. Maturitas 44 (Suppl 1): S67-77, 2003.12609561
Raus K, Brucker C, Gorkow C, et al.: First-time proof of endometrial safety of the special black cohosh extract (Actaea or Cimicifuga racemosa extract) CR BNO 1055. Menopause 13 (4): 678-91, 2006 Jul-Aug.16837890

## Adverse Effects

In general, the hydroalcoholic black cohosh extracts that are widely used as components in commercially available products—and those used in clinical trials—have been very well tolerated, producing rare serious adverse effects, which are likely due to product quality issues (adulteration) rather than black cohosh itself. An overview of the adverse events from a systematic review of the results of several clinical trials, postmarketing surveillance studies, case series, and case reports found only rare serious adverse events that may not have been induced by black cohosh.[1] The most common minor adverse effects noted in these trials were gastrointestinal symptoms (e.g., nausea) and musculoskeletal and connective tissue disorders (e.g., joint pain, rashes).[1]

### Herb-Drug Interactions

A small number of studies have explored the potential for black cohosh extracts to interfere with the metabolism or activity of drugs. One group studied the in vivo effect of black cohosh extracts on cytochrome P450 enzymes at doses up to 1,090 mg bid (0.2% triterpene glycosides) and found only weak inhibition of CYP2D6 [2] and no effect on CYP3A4.[3] A single case report suggested a possible effect of a black cohosh extract on reducing the cholesterol-lowering effects of statins.[4]

### References

Borrelli F, Ernst E: Black cohosh (Cimicifuga racemosa): a systematic review of adverse events. Am J Obstet Gynecol 199 (5): 455-66, 2008.18984078
Gurley BJ, Gardner SF, Hubbard MA, et al.: In vivo effects of goldenseal, kava kava, black cohosh, and valerian on human cytochrome P450 1A2, 2D6, 2E1, and 3A4/5 phenotypes. Clin Pharmacol Ther 77 (5): 415-26, 2005.15900287
Gurley BJ, Swain A, Hubbard MA, et al.: Clinical assessment of CYP2D6-mediated herb-drug interactions in humans: effects of milk thistle, black cohosh, goldenseal, kava kava, St. John's wort, and Echinacea. Mol Nutr Food Res 52 (7): 755-63, 2008.18214849
Asher GN, Corbett AH, Hawke RL: Common Herbal Dietary Supplement-Drug Interactions. Am Fam Physician 96 (2): 101-107, 2017.28762712

## Summary of the Evidence for Black Cohosh

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal and include sufficient parameters about the quality and reproducibility of the investigated material derived from black cohosh.
- Report on therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in sufficient detail for a meaningful evaluation to be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For an explanation of the scores and additional information about levels of evidence analysis of CAM treatments for cancer, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

The Committee on Herbal Medicinal Products of the European Medicines Agency describes black cohosh products as a medicine that may be used for the treatment of menopausal symptoms, based on their assessment of the results of around 20 clinical trials involving over 6,000 patients who received black cohosh.[1] However, the lack of demonstration of a clinical benefit significantly greater than that of placebo and the fact that much less research has been performed with cancer patients should lead to extra caution when its use in such patients is being considered .

### References

Cimicifugae Rhizoma. Amsterdam, The Netherlands: European Medicines Agency, 2018. Available online (https://www.ema.europa.eu/en/medicines/herbal/cimicifugae-rhizoma). Last accessed September 18, 2024.

## Latest Updates to This Summary (10/31/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of black cohosh in people with cancer.. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Black Cohosh. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/black-cohosh-pdq. Accessed <MM/DD/YYYY>. [PMID: 33433969]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).